# Childhood Carcinoma of Unknown Primary Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood carcinoma of unknown primary. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Carcinoma of Unknown Primary

Key Points for This Section
- Carcinoma of unknown primary is a disease in which malignant (cancer) cells are found in the body but the place the cancer began is not known.
- The signs and symptoms of disease are caused by the metastatic cancer and depend on where the cancer has spread.
- Blood and imaging tests are done to learn more about the cause of the signs and symptoms.
- A biopsy is done to diagnose metastatic cancer.
- Because the place where the cancer started is not known, more tests and procedures are done to search for the primary cancer.
- When tests are able to find the primary cancer, the cancer is no longer a CUP and treatment is based on the type of primary cancer.
- Sometimes the primary cancer is never found.

### Carcinoma of unknown primary is a disease in which malignant (cancer) cells are found in the body but the place the cancer began is not known.

Cancer can form in any tissue in the body. The first cancer to form is called the primary cancer. The process of cancer cells spreading to other parts of the body is called metastasis. The cancer that has spread to another part of the body is called metastatic cancer.

In carcinoma of unknown primary (CUP), metastatic cancer is diagnosed, but the primary cancer has not been found.

This type of cancer is also called occult primary tumor.

In cancer of unknown primary, cancer cells have spread in the body but the place where the primary cancer began is not known.

Cancer of unknown primary; drawing shows a primary tumor that has spread from an unknown site to other parts of the body (the lung and the brain). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph systems, to another part of the body where a metastatic tumor has formed.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### The signs and symptoms of disease are caused by the metastatic cancer and depend on where the cancer has spread.

The primary cancer does not cause signs and symptoms of disease.

Check with your doctor if you have any of the following general signs of cancer:

- Lump or thickening in any part of the body.
- Pain that is in one part of the body and does not go away.
- A cough that does not go away or hoarseness in the voice.
- Change in bowel or bladder habits, such as constipation, diarrhea, or frequent urination.
- Unusual bleeding or discharge.
- Fever for no known reason that does not go away.
- Drenching night sweats.
- Weight loss for no known reason or loss of appetite.

### Blood and imaging tests are done to learn more about the cause of the signs and symptoms.

Tests and procedures that may be used are described below.

### A biopsy is done to diagnose metastatic cancer.

A biopsy is the removal of cells or tissues so they can be viewed under a microscope by a pathologist.

One of the following types of biopsies may be used:

- Fine-needle aspiration (FNA) biopsy: The removal of tissue or fluid using a thin needle.
- Core biopsy: The removal of tissue using a wide needle.
- Incisional biopsy: The removal of part of a lump or a sample of tissue.
- Excisional biopsy: The removal of an entire lump of tissue.

The pathologist views the tissue to look for cancer cells and to find out the type of cancer. Cancer cells usually look like the cells in the type of tissue in which the cancer began. In CUP, the cancer cells do not look like the cells of the tissue they were found in. The pathologist cannot determine the type of primary cancer.

One or more of the following laboratory tests may be used to further study the tissue samples:

- Genetic analysis: A laboratory test in which the DNA in a sample of cancer cells or tissue is studied to check for mutations (changes) that may help predict the best treatment for CUP.
- Histologic study: A laboratory test in which stains are added to a sample of cancer cells or tissue and viewed under a microscope to look for certain changes in the cells. Certain changes in the cells are linked to certain types of cancer.
- Immunohistochemistry: A laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient’s tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.
- Reverse transcription–polymerase chain reaction (RT–PCR) test: A laboratory test in which the amount of a genetic substance called mRNA made by a specific gene is measured. An enzyme called reverse transcriptase is used to convert a specific piece of RNA into a matching piece of DNA, which can be amplified (made in large numbers) by another enzyme called DNA polymerase. The amplified DNA copies help tell whether a specific mRNA is being made by a gene. RT–PCR can be used to check the activation of certain genes that may indicate the presence of cancer cells. This test may be used to look for certain changes in a gene or chromosome, which may help diagnose cancer.
- Cytogenetic analysis: A laboratory test in which the chromosomes of cells in a sample of tumor tissue are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working. Changes in certain chromosomes are linked to certain types of cancer.
- Light and electron microscopy: A laboratory test in which cells in a sample of tissue are viewed under regular and high-powered microscopes to look for certain changes in the cells.

### Because the place where the cancer started is not known, more tests and procedures are done to search for the primary cancer.

The following tests and procedures may be done:

- Physical exam and health history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the chest or abdomen, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- PET scan (positron emission tomography scan): A procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.
- Endoscopy: A procedure to look at organs and tissues inside the body to check for abnormal areas. An endoscope is inserted through an incision (cut) in the skin or opening in the body, such as the mouth. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of disease. For example, a colonoscopy may be done.
- Tumor marker test: A procedure in which a sample of blood, urine, or tissue is checked to measure the amounts of certain substances made by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the body. These are called tumor markers. The blood may be checked for the levels of CA-125, CgA, alpha-fetoprotein (AFP), beta human chorionic gonadotropin (beta-hCG), or prostate-specific antigen (PSA).

### When tests are able to find the primary cancer, the cancer is no longer a CUP and treatment is based on the type of primary cancer.

When it is not known where the cancer first formed at diagnosis, adenocarcinomas, melanomas, and embryonal tumors (such as rhabdomyosarcoma or neuroblastoma) are tumor types that are often diagnosed later in children and adolescents.

### Sometimes the primary cancer is never found.

The primary cancer (the cancer that first formed) may not be found for one of the following reasons:

- The primary cancer is very small and grows slowly.
- The body’s immune system killed the primary cancer.
- The primary cancer was removed during surgery for another condition and doctors didn’t know cancer had formed. For example, in adults, a uterus with cancer may be removed during a hysterectomy to treat a serious infection.

Because the primary cancer is unknown, it may be harder to choose the best treatment.

## Stages of Childhood Carcinoma of Unknown Primary

The extent or spread of cancer is usually described as stages. The stage of the cancer is usually used to plan treatment. However, carcinoma of unknown primary (CUP) has already spread to other parts of the body when it is found. There is no standard staging system for CUP.

Sometimes childhood carcinoma of unknown primary recurs (comes back) after treatment.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with carcinoma of unknown primary.
- Children with carcinoma of unknown primary should have their treatment planned by a team of doctors who are experts in treating childhood cancer.
- Three types of standard treatment are used:
  - Radiation therapy
  - Chemotherapy
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for childhood carcinoma of unknown primary may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for children with carcinoma of unknown primary.

Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment.

Because cancer in children is rare, taking part in a clinical trial should be considered. Some clinical trials are open only to patients who have not started treatment.

### Children with carcinoma of unknown primary should have their treatment planned by a team of doctors who are experts in treating childhood cancer.

Treatment will be overseen by a pediatric oncologist, a doctor who specializes in treating children with cancer. The pediatric oncologist works with other pediatric health professionals who are experts in treating children with cancer and who specialize in certain areas of medicine. This may include the following specialists and others:

- Pediatrician.
- Radiation oncologist.
- Pathologist.
- Social worker.
- Rehabilitation specialist.
- Psychologist.
- Child-life specialist.

### Three types of standard treatment are used:

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with metastatic cancer.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy).

#### Targeted therapy

Targeted therapy is a treatment that uses drugs or other substances to identify and attack cancer cells.Targeted therapies usually cause less harm to normal cells than chemotherapy and radiation therapy do.

### New types of treatment are being tested in clinical trials.

Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for childhood carcinoma of unknown primary may cause side effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment of Childhood Carcinoma of Unknown Primary

Treatment of newly diagnosed carcinoma of unknown primary (CUP) in children depends on the following:

- What the cancer cells look like under a microscope.
- The child's age.
- The child's signs and symptoms.
- The results of tests and procedures.
- Where the cancer has spread in the body.

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed CUP in children may include the following:

- Radiation therapy.
- Chemotherapy.
- Targeted therapy.

Sometimes childhood carcinoma of unknown primary can recur (come back) after treatment. If your child is diagnosed with a recurrent carcinoma of unknown primary, your child's doctor will work with you to plan treatment.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Childhood Carcinoma of Unknown Primary

For more information from the National Cancer Institute about carcinoma of unknown primary, see the following:

- Carcinoma of Unknown Primary Home Page (https://www.cancer.gov/types/unknown-primary)
- Metastatic Cancer (https://www.cancer.gov/types/metastatic-cancer)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Targeted Cancer Therapies (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood carcinoma of unknown primary. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Carcinoma of Unknown Primary Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/unknown-primary/patient/child-unknown-primary-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).